# Topics in Integrative, Alternative, and Complementary Therapies (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the complementary and alternative therapies found in other PDQ summaries and NCI Fact Sheets. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board.

## Overview

This summary gives a brief description of some of the integrative, alternative, and complementary therapies used by people with cancer. Links to additional information, references, and resources on the NCI website are provided in this summary. This summary does not include all integrative, alternative, and complementary therapies.

Complementary and alternative medicine (CAM) includes many different kinds of therapies, botanicals, and dietary supplements. Complementary medicine is treatment that is used along with standard treatments but is not considered standard. Alternative medicine is treatment that is used instead of standard treatments. In general, less research has been done for CAM than for standard treatments. Integrative therapy is medical care that combines standard care with CAM practices.

The 2007 National Health Interview Survey reported that about 4 out of 10 adults use a CAM therapy. Natural products and deep breathing exercises were the most common. One large survey reported on the use of complementary therapies in cancer survivors. The therapies used most often were prayer and spiritual practice, relaxation, faith and spiritual healing, and nutritional supplements and vitamins.

CAM therapies are used often to treat children with cancer, both inside and outside of clinical trials. CAM therapies have been used to treat side effects caused by cancer or cancer treatment. Cancer patients sometimes choose alternative medicine over standard treatment; however, alternative medicine does not work as well as standard medicine to treat cancer. In Asian countries, traditional Chinese medical therapies are often used along with standard therapy.

One study showed that when cancer patients and their doctors talked about CAM therapy, it was most often brought up by the patient. Both the patient and the doctor were more satisfied with the visit when they talked about CAM therapy.

This cancer information summary gives a brief description of integrative, alternative, and complementary therapies found in PDQ Cancer Information Summaries or Fact Sheets from the National Cancer Institute (NCI). Links are included to take you to the specific PDQ summary or NCI Fact Sheet for more information about each topic. See NCI's Office of Cancer Complementary and Alternative Medicine (https://cam.cancer.gov/) for links to other resources.

## Acupuncture

Acupuncture is a part of traditional Chinese medicine used in China and other Asian countries for thousands of years. In patients with cancer, acupuncture is usually used to relieve symptoms, treat side effects of therapy, such as pain, nausea and vomiting, and improve quality of life.

- See the PDQ patient summary on Acupuncture for more information.

## Botanicals/Herbal Products

### Black Cohosh

Black cohosh is a North American perennial herb. A substance found in the root of this plant has been used to treat a number of medical conditions. Black cohosh has been studied to relieve hot flashes. However, randomized, placebo-controlled clinical trials using this herb have found that black cohosh doesn't work any better than a placebo (inactive substance) in relieving hot flashes.

- See the Herbs/Dietary Supplements section in the PDQ health professional summary on Hot Flashes and Night Sweats for more information on black cohosh.

### Cannabis and Cannabinoids (also known as marijuana)

Cannabis is a plant from Central Asia that is grown in many parts of the world today. In the United States, it is a controlled substance and is classified as a Schedule I agent (a drug with increased potential for abuse and no known medical use). The Cannabis plant makes a resin that contains active chemicals called cannabinoids. Cannabinoids cause drug-like effects throughout the body, including the central nervous system and the immune system. Possible benefits of medicinal Cannabis for people living with cancer include control of nausea and vomiting, increasing appetite, relieving pain, and improving sleep.

- See the PDQ patient summary on Cannabis and Cannabinoids for more information.

### Essiac/Flor Essence

Essiac and Flor Essence are herbal tea mixtures originally developed in Canada. They are sold worldwide as dietary supplements. Supporters of Essiac and Flor Essence say that these products can help detoxify the body, make the immune system stronger, and fight cancer. There is no evidence in clinical trials that Essiac or Flor Essence can help treat patients with cancer.

- See the PDQ patient summary on Essiac/Flor Essence for more information.

### Flaxseed

Flaxseed comes from the flax plant. It is a rich source of omega-3 fatty acid, fiber, and compounds called lignans. It is being studied in the prevention of several types of cancer. Flaxseed has also been studied for its effect on hot flashes.

- See the Herbs/Dietary Supplements section in the PDQ health professional summary on Hot Flashes and Night Sweats for more information on flaxseed.

### Ginger

Ginger is a root that is used in cooking and in some cultures to treat medical conditions such as nausea. It can be used fresh, dried and powdered, or as a juice or oil. Ginger has been studied for the relief of nausea and vomiting in cancer patients.

- See the Ginger section in the PDQ health professional summary on Treatment-Related Nausea and Vomiting for information about a randomized controlled trial of ginger in cancer patients.

### Ginseng

Ginseng is an herb that is used to treat fatigue. It may be taken in capsules of ground ginseng root. Studies of ginseng have been done in patients either during or after their treatment for cancer. Patients who were given ginseng had less fatigue than patients who were given a placebo (inactive substance).

- See the Intervention section in the PDQ health professional summary on Fatigue for more information.

### L-carnitine

L-carnitine is a dietary supplement that is thought to be helpful in treating fatigue related to cancer. L-carnitine helps the body make energy and lowers inflammation that may be linked to fatigue.

- See the Intervention section in the PDQ summary on Fatigue for more information.

### Marijuana

See the Cannabis and Cannabinoids section in this summary.

### Medicinal Mushrooms

Medicinal mushrooms have been used for hundreds of years, mainly in Asian countries, to treat infections. More recently, medicinal mushrooms have also been used to treat lung diseases and cancer.

- See the PDQ patient summary on Medicinal Mushrooms for more information.

### Milk Thistle

Milk thistle is a plant whose fruits have been used for more than 2,000 years as a treatment for liver and bile duct disorders. The active substance in milk thistle is silymarin. Milk thistle has been studied in the treatment of side effects caused from cancer and cancer treatment.

- See the PDQ patient summary on Milk Thistle for more information.

### Mistletoe Extracts

Mistletoe is a plant used commonly in Europe, where different extracts are made and sold as injectable prescription drugs. The FDA has not approved mistletoe as a treatment for cancer or any other medical condition.

- See the PDQ patient summary on Mistletoe Extracts for more information.

### PC-SPES

PC-SPES is a patented mixture of eight herbs. PC-SPES was taken off the market because some batches had prescription medicines in them. The manufacturer is no longer in business and PC-SPES is no longer being made.

- See the PDQ patient summary on PC-SPES for more information.

### St. John's Wort

St. John's wort (Hypericum perforatum) is an herbal product sold as an over-the-counter treatment for depression. St. John's wort has not been proven to be better than standard antidepressant medicines. Studies have been done to compare St. John's wort with antidepressants, placebo (inactive) medicines, or both, and have shown mixed results.

Be sure to talk with your doctor before taking St. John's wort. It may change the way some of your other medicines work, including anticancer medicines. Also, there are no standards for companies that make St. John's wort, so the amount of active ingredient may be different in each brand.

### Selected Vegetables/Sun's Soup

“Selected Vegetables” and “Sun’s Soup” are different mixtures of vegetables and herbs that have been studied as treatments for cancer. Dried and frozen forms of Selected Vegetables are sold in the United States as dietary supplements. The vegetables and herbs in Selected Vegetables/Sun’s Soup are thought to have substances that block the growth of cancer cells and/or help the body's immune system kill cancer cells. There is very little evidence that Selected Vegetables/Sun’s Soup is useful as a treatment for cancer and no randomized or controlled clinical trials have been done.

- See the PDQ patient summary on Selected Vegetables/Sun’s Soup for more information.

## Mind-Body Therapies

### Aromatherapy With Essential Oils

Aromatherapy is the use of essential oils from plants (flowers, herbs, or trees) as therapy to improve physical, emotional, and spiritual well-being. Patients with cancer use aromatherapy mainly as supportive care to improve their quality of life, such as lowering stress and anxiety. Aromatherapy may be used with other complementary treatments, such as massage and acupuncture, as well as with standard treatment.

- See the PDQ patient summary on Aromatherapy With Essential Oils for more information.

### Cognitive-Behavioral Therapy (CBT)

Cognitive-behavioral therapy (CBT) is a type of psychotherapy that helps patients change their behavior by changing the way they think and feel about certain things. CBT may help treat many side effects of cancer and cancer treatment.

CBT has been studied for insomnia.

- See the Management section in the PDQ health professional summary on Sleep Disorders for information about CBT use for insomnia.

Relaxation therapy and imagery have been used to treat anticipatory nausea and vomiting.

- See the Anticipatory Nausea and Vomiting and Treating Nausea and Vomiting Without Drugs sections in the PDQ patient summary on Nausea and Vomiting Related to Cancer Treatment.

CBT may be helpful for depression in patients with cancer. Most counseling or talk therapy programs for depression are offered in both individual and small-group settings.

- See the Treatment of Depression section in the PDQ patient summary on Depression for more information about talk therapy and counseling.

CBT may be used to treat post-traumatic stress disorder symptoms in patients with cancer. The treatment can focus on solving problems, teaching coping skills, and providing a supportive setting for the patient.

- See the Treatment section in the PDQ patient summary on Cancer-Related Post-traumatic Stress for more information.

### Hypnosis

Hypnosis is a trance-like state that allows a person to be more aware and focused and more open to suggestion. Under hypnosis, the person can concentrate more clearly on a specific thought, feeling, or sensation without becoming distracted.

- See the Psychosocial Interventions for Distress section in the PDQ health professional summary on Adjustment to Cancer: Anxiety and Distress for more information on a study about hypnosis used to relieve stress before surgery.

### Qigong

Qigong is a form of traditional Chinese medicine that combines movement, meditation, and controlled breathing. Its purpose is to enhance the vital energy or life force that keeps a person’s spiritual, emotional, mental, and physical health in balance. Some clinical trials have shown that qigong may improve their quality of life and fatigue related to cancer.

- See the Exercise section in the PDQ patient summary on Fatigue for more information about how qigong is being studied in fatigue related to cancer.

### Spirituality

Studies have shown that religious and spiritual values are important to most Americans. Many patients with cancer rely on spiritual or religious beliefs and practices to help them cope with their disease. For healthcare providers, spiritual or religious well-being are sometimes viewed as an aspect of complementary and alternative medicine.

- See the PDQ patient summary on Spirituality for information about religion, spirituality, spiritual well-being, and health.

### Tai Chi

Tai chi is a form of traditional Chinese mind-body exercise and meditation that uses slow sets of body movements and controlled breathing. Tai chi is done to improve balance, flexibility, muscle strength, and overall health. Some clinical trials have shown that tai chi may improve their quality of life and fatigue related to cancer.

- See the Exercise section in the PDQ patient summary on Fatigue for more information about how tai chi is being studied in fatigue related to cancer.
- See the PDQ summary on Cognitive Impairment in Adults with Non−Central Nervous System Cancers for more information about how tai chi is being studied in problems with memory and thinking.

### Yoga

Yoga is an ancient system of practices used to balance the mind and body through movement, meditation (focusing thoughts), and control of breathing and emotions. Yoga is being studied as a way to relieve stress and improve sleep in cancer patients. One study showed that breast cancer survivors who took part in a yoga program had lower levels of fatigue and inflammation (swelling).

- See the Mindfulness-based therapy section in the PDQ health professional summary on Adjustment to Cancer: Anxiety and Distress for information about a clinical trial using meditation and yoga to lower stress.

## Nutritional Therapies

### Antioxidants and Cancer Prevention

Antioxidants are substances that may protect cells from the damage caused by unstable molecules known as free radicals. Free radical damage may lead to cancer. Examples of antioxidants include beta-carotene, lycopene, vitamins C, E, and A, and other substances.

There has been some concern about whether antioxidants may make chemotherapy and radiation therapy less effective.

- See Antioxidants and Cancer Prevention (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/antioxidants-fact-sheet) for more information about antioxidants.

### Coenzyme Q10

Coenzyme Q10 is made by the body. Coenzyme Q10 helps cells produce energy and acts as an antioxidant. Studies show that coenzyme Q10 may protect the heart from damage caused by certain chemotherapy drugs.

- See the PDQ patient summary on Coenzyme Q10 for more information.

### Dietary Supplements

Many studies suggest that the use of complementary and alternative medicine is common among many cancer patients, and the use of vitamins, supplements, and specific foods is frequently reported by patients with prostate cancer.

- See the PDQ patient summary on Prostate Cancer, Nutrition, and Dietary Supplements for information about green tea, lycopene, modified citrus pectin, pomegranate, soy, and Zyflamend supplements used by some patients with prostate cancer.

### Gerson Therapy

The Gerson therapy is used by some practitioners to treat cancer, based on changes in diet and nutrient intake. An organic vegetarian diet plus nutritional and biological supplements, pancreatic enzymes, and coffee or other types of enemas are all part of the Gerson therapy. Few clinical studies of the Gerson therapy have been published.

- See the PDQ patient summary on Gerson Therapy for more information.

### Glutamine

Glutamine is an amino acid that is important for the health of gastrointestinal (GI) mucosal cells. These cells are often damaged by chemotherapy and radiation therapy. This causes mucositis (inflammation of the lining of the digestive system, often seen as mouth sores) and diarrhea. This can lead to treatment delays, small doses, and may severely affect quality of life. Some studies suggest that oral glutamine can reduce mucositis and diarrhea by helping mucosal cells and the entire GI tract heal faster.

- See the Nutrition Trends in Cancer section in the PDQ health professional summary on Nutrition in Cancer Care for information on trials that studied oral glutamine.

### Gonzalez Regimen

The Gonzalez regimen is a cancer treatment that is tailored by the practitioner for each patient and is available only to the patients of its developer. It involves taking certain pancreatic enzymes thought to have anticancer activity. The regimen also includes specific diets, vitamin and mineral supplements, extracts of animal organs, and coffee enemas.

- See the PDQ patient summary on Gonzalez Regimen for more information.

### Lycopene

Lycopene is a carotenoid (a natural pigment made by plants). It is found in a number of fruits and vegetables, including apricots, guava, and watermelon. The main source of lycopene in the American diet is tomato-based products. Lycopene is thought to have antioxidant activity. Lycopene has been studied for its role in chronic diseases, including cardiovascular disease and cancer.

- See the Lycopene section in the PDQ patient summary on Prostate Cancer, Nutrition, and Dietary Supplements for more information.

### Melatonin

Melatonin is a hormone made by the pineal gland during the hours of darkness. It plays a major role in the sleep-wake cycle. Clinical studies in renal, breast, colon, lung, and brain cancer suggest that melatonin may make chemotherapy and radiation therapy more effective; however randomized, blinded trials are needed to study these results.

- See the Botanical/Dietary supplements section in the PDQ health professional summary on Sleep Disorders for information about how melatonin is being studied in sleep disturbances.
- See the Nutrition Trends in Cancer section in the PDQ health professional summary on Nutrition in Cancer Care for information on how melatonin is being studied with chemotherapy or radiation therapy.

### Modified Citrus Pectin (MCP)

Citrus pectin is found in the peel and pulp of citrus fruits such as oranges, grapefruit, lemons, and limes. Citrus pectin can be modified so that it can be digested and absorbed by the body. Modified citrus pectin (MCP) may have effects on cancer growth and metastasis. Some research suggests that MCP may protect against different types of cancer, including colon, lung, and prostate cancer.

- See the Modified Citrus Pectin section in the PDQ patient summary on Prostate Cancer, Nutrition, and Dietary Supplements for more information.

### Pomegranate

The pomegranate (Punica granatum L.) plant is native to Asia and grown in many parts of the world. Different parts of the pomegranate fruit have bioactive compounds that may support good health, including antioxidants found in the peel. Certain pomegranate extracts have been shown in laboratory studies to slow the growth and spread of prostate cancer cells and to cause cell death.

- See the Pomegranate section in the PDQ patient summary on Prostate Cancer, Nutrition, and Dietary Supplements for more information.

### Probiotics

Probiotics are live microorganisms used as dietary supplements to help with digestion and normal bowel function. A bacterium found in yogurt called Lactobacillus acidophilus is the most common probiotic. The use of probiotics may be recommended in conditions related to diarrhea and other gastrointestinal problems, such as gut-barrier dysfunction and inflammation.

- See the Probiotics section in the PDQ health professional summary on Gastrointestinal Complications for information about probiotics.
- See the Nutrition Trends in Cancer section in the PDQ health professional summary on Nutrition in Cancer Care for information on trials that used probiotics before radiation therapy.

### Selenium

Selenium is a trace mineral (a nutrient that is essential to humans in tiny amounts). Selenium is found in certain proteins that are active in many body functions, including reproduction and immunity. Selenium is being studied for its role in cancer.

- See the Selenium section in the PDQ patient summary on Prostate Cancer, Nutrition, and Dietary Supplements for information about studies of selenium in prostate cancer.

### Soy

Soy comes from a plant native to Asia that grows beans that are used in many food products. Soy foods, such as soy milk, miso, tofu, and soy flour, contain phytochemicals that may have health benefits. Isoflavones are the most widely studied compounds in soy. Soy is being studied for the prevention of cancer, hot flashes during menopause, and osteoporosis (loss of bone density).

- See the Non-Drug Treatment for Hot Flashes and Night Sweats in Patients with Cancer section in the PDQ patient summary on Hot Flashes and Night Sweats for more information on the use of soy in patients with breast cancer.
- See the Soy section in the PDQ patient summary on Prostate Cancer, Nutrition, and Dietary Supplements for information about studies of soy in prostate cancer.

### Tea

Tea comes from the plant Camellia sinensis. Tea contains polyphenol compounds including catechins, which are antioxidants that help protect cells from damage caused by free radicals.

- See Tea and Cancer Prevention: Strengths and Limits of the Evidence (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/tea-fact-sheet) for information about tea and cancer prevention.

Some studies suggest that green tea may help protect against cardiovascular disease. There is also evidence that green tea may protect against different types of cancer.

- See the Green Tea section in the PDQ patient summary on Prostate Cancer, Nutrition, and Dietary Supplements for more information about studies of green tea in prostate cancer.

### Vitamin C, High-Dose

Vitamin C (ascorbic acid) is a nutrient that humans must get from food or supplements since it cannot be made in the body. Vitamin C is an antioxidant and helps prevent oxidative stress. It also works with enzymes to play a key role in making collagen. High-dose vitamin C has been studied as a treatment for cancer patients.

- See the PDQ patient summary on High-Dose Vitamin C for more information.

### Vitamin D

Vitamin D is a nutrient involved in a number of functions that are necessary for good health. Skin exposed to sunshine can make Vitamin D. It can also be consumed in the diet, but very few foods naturally contain vitamin D. These foods include fatty fish, fish liver oil, and eggs.

- See Vitamin D and Cancer Prevention (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/vitamin-d-fact-sheet) for information about studies of the possible role of vitamin D in cancer prevention.
- See the Vitamin D section in the PDQ patient summary on Prostate Cancer, Nutrition, and Dietary Supplements for information about studies of vitamin D in prostate cancer.

### Vitamin E

Vitamin E is a nutrient that the body needs in small amounts to stay healthy and work the way it should. It is fat-soluble (can dissolve in fats and oils) and is found in seeds, nuts, leafy green vegetables, and vegetable oils. Vitamin E boosts the immune system and helps keep blood clots from forming. It also helps prevent cell damage caused by free radicals (unstable molecules in the body). Vitamin E is being studied in the prevention and treatment of some types of cancer. It is a type of antioxidant.

- See the Vitamin E section in the PDQ patient summary on Prostate Cancer, Nutrition, and Dietary Supplements for information about studies of vitamin E in prostate cancer.
- See the Non-Drug Treatment for Hot Flashes and Night Sweats in Patients with Cancer section in the PDQ patient summary on Hot Flashes and Night Sweats for information about studies of Vitamin E in hot flashes.

## Pharmacologic Treatments

### 714-X

714-X is a chemical compound that contains camphor, which is a natural substance that comes from the wood and bark of the camphor tree. Nitrogen, water, and salts are added to camphor to make 714-X. It is claimed that 714-X protects the immune system and helps the body fight cancer. No peer-reviewed studies of 714-X have been published to show that it is safe or effective in treating cancer.

- See the PDQ patient summary on 714-X for more information.

### Antineoplastons

Antineoplastons are drugs made of chemical compounds that occur naturally in the urine and blood. It has been claimed that antineoplaston therapy can be used to stop certain cancer cells from dividing, while healthy cells are not affected.

- See the PDQ patient summary on Antineoplastons for more information.

### Cancell/Cantron/Protocel

Cancell/Cantron/Protocel is a liquid that has been made in different forms since the late 1930s. It is also known by the names Sheridan’s Formula, Jim’s Juice, JS-114, JS-101, 126-F, and the "Cancell-like" products Cantron and Protocel. The exact ingredients of Cancell/Cantron/Protocel are not known and it is not effective in treating any type of cancer.

- See the PDQ patient summary on Cancell/Cantron/Protocel for more information.

### Cartilage (Bovine and Shark)

Bovine (cow) cartilage and shark cartilage have been studied as treatments for cancer and other medical conditions for more than 30 years. Substances that keep the body from making the new blood vessels that a tumor needs to grow have been found in bovine cartilage and shark cartilage. However, these substances have not been shown to affect the growth of normal cells or tumor cells.

- See the PDQ patient summary on Cartilage (Bovine and Shark) for more information.

### Hydrazine Sulfate

Hydrazine sulfate is a chemical that has been studied as a treatment for cancer and as a treatment for cachexia (body wasting) that can develop with this disease. It has been claimed that hydrazine sulfate limits the ability of tumors to take in glucose, which is a type of sugar that tumor cells need to grow.

- See the PDQ patient summary on Hydrazine Sulfate for more information.

### Laetrile/Amygdalin

Laetrile is another name for the chemical amygdalin, which is found in the pits of many fruits and in many plants. Cyanide is thought to be the active anticancer ingredient of laetrile. Laetrile has shown little anticancer activity in animal studies and no anticancer activity in clinical trials in humans.

- See the PDQ patient summary on Laetrile/Amygdalin for more information.

### Newcastle Disease Virus (NDV)

Newcastle Disease Virus (NDV) is usually thought to be an avian (bird) virus, but it also infects humans. It causes a potentially fatal, noncancerous disease (Newcastle disease) in birds, but causes only minor illness in humans. NDV appears to copy itself much better in human cancer cells than in most normal human cells and is being studied for anticancer effects.

- See the PDQ patient summary on Newcastle Disease Virus for more information.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the complementary and alternative therapies found in other PDQ summaries and NCI Fact Sheets. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/about-cancer/treatment/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Topics in Integrative, Alternative, and Complementary Therapies. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/patient/cam-topics-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389508]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).

## General CAM Information

Complementary and alternative medicine (CAM)—also called integrative medicine—includes a broad range of healing philosophies, approaches, and therapies. A therapy is generally called complementary when it is used in addition to conventional treatments; it is often called alternative when it is used instead of conventional treatment. (Conventional treatments are those that are widely accepted and practiced by the mainstream medical community.) Depending on how they are used, some therapies can be considered either complementary or alternative. Complementary and alternative therapies are used in an effort to prevent illness, reduce stress, prevent or reduce side effects and symptoms, or control or cure disease.

Unlike conventional treatments for cancer, complementary and alternative therapies are often not covered by insurance companies. Patients should check with their insurance provider to find out about coverage for complementary and alternative therapies.

Cancer patients considering complementary and alternative therapies should discuss this decision with their doctor, nurse, or pharmacist as they would any type of treatment. Some complementary and alternative therapies may affect their standard treatment or may be harmful when used with conventional treatment.

## Evaluation of CAM Therapies

It is important that the same scientific methods used to test conventional therapies are used to test CAM therapies. The National Cancer Institute and the National Center for Complementary and Integrative Health (NCCIH) are sponsoring a number of clinical trials (research studies) at medical centers to test CAM therapies for use in cancer.

Conventional approaches to cancer treatment have generally been studied for safety and effectiveness through a scientific process that includes clinical trials with large numbers of patients. Less is known about the safety and effectiveness of complementary and alternative methods. Few CAM therapies have been tested using demanding scientific methods. A small number of CAM therapies that were thought to be purely alternative approaches are now being used in cancer treatment—not as cures, but as complementary therapies that may help patients feel better and recover faster. One example is acupuncture. According to a panel of experts at a National Institutes of Health (NIH) meeting in November 1997, acupuncture has been found to help control nausea and vomiting caused by chemotherapy and pain related to surgery. However, some approaches, such as the use of laetrile, have been studied and found not to work and to possibly cause harm.

The NCI Best Case Series Program (https://cam.cancer.gov/indentifying_novel_cam_therapies/best_case_series_program.htm) which was started in 1991, is one way CAM approaches that are being used in practice are being studied. The program is overseen by the NCI’s Office of Cancer Complementary and Alternative Medicine (OCCAM). Health care professionals who offer alternative cancer therapies submit their patients’ medical records and related materials to OCCAM. OCCAM carefully reviews these materials to see if any seem worth further research.

## Questions to Ask Your Health Care Provider About CAM

When considering complementary and alternative therapies, patients should ask their health care provider the following questions:

- What side effects can be expected?
- What are the risks related to this therapy?
- What benefits can be expected from this therapy?
- Do the known benefits outweigh the risks?
- Will the therapy affect conventional treatment?
- Is this therapy part of a clinical trial?
- If so, who is the sponsor of the trial?
- Will the therapy be covered by health insurance?

## To Learn More About CAM

National Center for Complementary and Integrative Health (NCCIH)

The National Center for Complementary and Integrative Health (NCCIH) at the National Institutes of Health (NIH) facilitates research and evaluation of complementary and alternative practices, and provides information about a variety of approaches to health professionals and the public.

- NCCIH Clearinghouse
- Post Office Box 7923 Gaithersburg, MD 20898–7923
- Telephone: 1-888-644-6226 (toll free)
- TTY (for deaf and hard of hearing callers): 1-866-464-3615
- E-mail: info@nccih.nih.gov
- Website: https://nccih.nih.gov

CAM on PubMed

NCCIH and the NIH National Library of Medicine (NLM) jointly developed CAM on PubMed (https://nccih.nih.gov/research/camonpubmed), a free and easy-to-use search tool for finding CAM-related journal citations. As a subset of the NLM's PubMed bibliographic database, CAM on PubMed features more than 230,000 references and abstracts for CAM-related articles from scientific journals. This database also provides links to the websites of over 1,800 journals, allowing users to view full-text articles. (A subscription or other fee may be required to access full-text articles.)

Office of Cancer Complementary and Alternative Medicine

The NCI Office of Cancer Complementary and Alternative Medicine (OCCAM) coordinates the activities of the NCI in the area of complementary and alternative medicine (CAM). OCCAM supports CAM cancer research and provides information about cancer-related CAM to health providers and the general public via the NCI website (https://www.cancer.gov/).

National Cancer Institute (NCI) Cancer Information Service

U.S. residents may call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, toll free at 1-800-4-CANCER (1-800-422-6237) Monday through Friday from 9:00 am to 9:00 pm. A trained Cancer Information Specialist is available to answer your questions.

Food and Drug Administration

The Food and Drug Administration (FDA) regulates drugs and medical devices to ensure that they are safe and effective.

- Food and Drug Administration
- 10903 New Hampshire Avenue
- Silver Spring, MD 20993
- Telephone: 1-888-463-6332 (toll free)
- Website: http://www.fda.gov

Federal Trade Commission

The Federal Trade Commission (FTC) enforces consumer protection laws. Publications available from the FTC include:

- Who Cares: Sources of Information About Health Care Products and Services
- Fraudulent Health Claims: Don’t Be Fooled

- Consumer Response Center
- Federal Trade Commission
- 600 Pennsylvania Avenue, NW
- Washington, DC 20580
- Telephone: 1-877-FTC-HELP (1-877-382-4357) (toll free)
- TTY (for deaf and hard of hearing callers): 202-326-2502
- Website: http://www.ftc.gov